# Gastric Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of gastric cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## What Is Stomach Cancer?

Stomach (gastric) cancer is cancer that starts in the cells lining the stomach. The stomach is an organ on the left side of the upper abdomen that digests food. The stomach is part of the digestive tract, a series of hollow, muscular organs joined in a long, twisting tube from the mouth to the anus. The digestive tract processes nutrients in foods that are eaten and helps pass waste material out of the body:

- Food moves from the throat to the stomach through a tube called the esophagus.
- After food enters the stomach, it is broken down by stomach muscles that mix the food and liquid with digestive juices.
- After leaving the stomach, partly digested food passes into the small intestine and then into the large intestine.
- The end of the large intestine, called the rectum, stores the waste from the digested food until it is pushed out of the anus during a bowel movement.

Anatomy of the digestive tract. The digestive tract is made up of organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.

Anatomy of the digestive tract; drawing shows the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.

### Types of stomach cancer

Adenocarcinoma of the stomach begins in the mucus-producing cells in the innermost lining of the stomach. Nearly all stomach cancers are adenocarcinomas.

Adenocarcinoma of the stomach is divided into two main classes, depending on where it forms in the stomach:

- Gastric cardia cancer begins in the top inch of the stomach, just below where it meets the esophagus.
- Non-cardia gastric cancer is cancer that begins in all other sections of the stomach.

Adenocarcinoma of the stomach also may be described as intestinal or diffuse, depending on how the cells look under a microscope:

- Intestinal adenocarcinomas are well differentiated, meaning the cancer cells look similar to normal cells under a microscope.
- Diffuse adenocarcinomas are undifferentiated or poorly differentiated, meaning the cancer cells look different from normal cells under a microscope. Diffuse adenocarcinomas tend to grow and spread more quickly than the intestinal type and be harder to treat.

Gastroesophageal junction adenocarcinoma (GEJ) is a cancer that forms in the area where the esophagus meets the gastric cardia. GEJ may be treated similarly to stomach cancer or esophageal cancer (https://www.cancer.gov/types/esophageal).

Gastrointestinal neuroendocrine tumors are cancers that begin in neuroendocrine cells (a type of cell that is like a nerve cell and a hormone-making cell) that line the gastrointestinal tract. Neuroendocrine cells make hormones that help control digestive juices and the muscles used in moving food through the stomach and intestines. Learn about gastrointestinal neuroendocrine tumors (https://www.cancer.gov/types/gi-neuroendocrine-tumors).

Gastrointestinal stromal tumors (GIST) begin in nerve cells that are found in the wall of the stomach and other digestive organs. GIST is a type of soft tissue sarcoma. Learn about gastrointestinal stromal tumors (https://www.cancer.gov/types/soft-tissue-sarcoma/patient/gist-treatment-pdq).

Primary gastric lymphoma is a type of non-Hodgkin lymphoma (https://www.cancer.gov/types/lymphoma/patient/adult-nhl-treatment-pdq) that forms in the stomach. Most primary gastric lymphomas are either mucosa-associated lymphoid tissue (MALT) gastric lymphoma or diffuse large B-cell lymphoma of the stomach.

Rarely, other types of cancer, such as squamous cell carcinoma, small cell carcinoma, and leiomyosarcoma, can also begin in the stomach.

## Stomach Cancer Symptoms

Early on, stomach cancer usually doesn't have symptoms, making it hard to detect. Symptoms usually begin after the cancer has spread.

When symptoms of early-stage stomach cancer do occur, they may include

- indigestion and stomach discomfort
- a bloated feeling after eating
- mild nausea
- loss of appetite
- heartburn

Symptoms of advanced stomach cancer (cancer has spread beyond the stomach to other parts of the body) may include the symptoms of early-stage stomach cancer and

- blood in the stool
- vomiting
- weight loss for no known reason
- stomach pain
- jaundice (yellowing of eyes and skin)
- ascites (https://www.cancer.gov/about-cancer/treatment/side-effects/ascites) (buildup of fluid in the abdomen)
- trouble swallowing

These symptoms may be caused by many conditions other than stomach cancer. It's important to check with your doctor if you have any of these symptoms. Your doctor will ask when your symptoms started and how often you've been having them. If it is stomach cancer, ignoring symptoms can delay treatment and make it less effective.

To learn more, see Stomach Cancer Diagnosis (https://www.cancer.gov/types/stomach/diagnosis).

## Stomach Cancer Diagnosis

If you have symptoms that suggest stomach cancer, your doctor will need to find out if they’re due to cancer or another condition. They may

- ask about your personal and family medical history to learn about your possible risk factors (https://www.cancer.gov/types/stomach/causes-risk-factors) for stomach cancer
- do a physical exam, which will include feeling your abdomen for anything abnormal
- run blood tests to check for anemia (a low red blood cell count), which could be a sign of bleeding in the stomach
- check your stool for hidden (occult) blood, which could be a sign of bleeding in the stomach

Depending on these results, your doctor may recommend tests to find out if you have stomach cancer.

### Tests to diagnose stomach cancer

The following tests and procedures are used to diagnose stomach cancer. The results will also help you and your doctor plan treatment.

#### Upper endoscopy with biopsy

Upper endoscopy is a procedure to look inside the esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope (a thin, lighted tube) is passed through the mouth and down the throat into the esophagus. It may also have a tool to remove a sample of cells or tissue (biopsy) so a pathologist can view it under a microscope to check for signs of cancer.

The sample of tissue may be checked for Helicobacter pylori (H. pylori) infection and used for biomarker testing.

Talk with your doctor to learn what to expect during and after your biopsy.

To learn about the type of information that can be found in a pathologist's report about the cells or tissue removed during a biopsy, see Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).

Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.

Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.

#### Barium swallow

Barium swallow is a series of x-rays of the esophagus and stomach. The patient drinks a liquid that contains barium (a silver-white metallic compound). The liquid coats the esophagus and stomach, and x-rays are taken. This procedure is also called an upper GI series.

Barium swallow for stomach cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as stomach cancer, to be seen on x-rays.

Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. Also shown is cancer in the stomach.

#### CT (CAT) scan

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. To learn more, see Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

#### Biomarker testing

Biomarker testing is a way to look for genes, proteins, and other substances (called biomarkers or tumor markers) that can provide information about cancer. Some biomarkers affect how certain cancer treatments work. Biomarker testing may help you and your doctor choose a cancer treatment for you.

To check for these biomarkers, samples of tissue containing stomach cancer cells are removed during a biopsy or surgery. The samples are tested in a laboratory to see whether the stomach cancer cells have these biomarkers.

For stomach cancer, biomarker testing includes the following:

- HER2: The cancer cells may have larger than normal amounts of a protein called HER2.
- PD-L1: The cells may have larger than normal amounts of an immune checkpoint protein called PD-L1.
- Microsatellite instability: The cells may have microsatellite instability. This may be caused by mistakes that don’t get corrected when DNA is copied in a cell.
- Mismatch repair deficiency: The cells may have a defect in a mismatch repair gene.
- Tumor mutational burden: If the cells have a high tumor mutational burden, it means they have many gene mutations.
- NTRK: The cells may have changes in one of the NTRK genes.

Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Learn more about Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

### Tests to stage stomach cancer

If you're diagnosed with stomach cancer, you will be referred to a gastrointestinal oncologist. This is a doctor who specializes in diagnosing and treating cancers of the stomach and intestines. Your doctor will recommend tests to find out if the cancer has spread and if so, how far. Sometimes the cancer is only in the stomach. Or, it may have spread from the stomach to other parts of the body. The process of learning the extent of cancer in the body is called staging. It is important to know the stage of the stomach cancer to plan treatment.

The following imaging tests and procedures may be used to find out your stage:

- Endoscopic ultrasound is a procedure in which an endoscope is inserted into the body, usually through the mouth or rectum. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure is also called endosonography.
- PET-CT scan combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself.
  - For the PET scan, a small amount of radioactive glucose is injected into a vein. The scanner rotates around the body and makes a picture of where glucose is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more glucose than normal cells.
  - For the CT scan, a series of detailed x-ray pictures of areas inside the body is taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly.
- Magnetic resonance imaging (MRI) with gadolinium is a procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Laparoscopy is a surgical procedure to look at the organs inside the abdomen to check for signs of disease. Small incisions (cuts) are made in the wall of the abdomen and a laparoscope (a thin, lighted tube) is inserted into one of the incisions. Other instruments may be inserted through the same or other incisions to perform procedures such as removing organs or taking tissue samples to be checked under a microscope for signs of cancer. A solution may be washed over the surface of the organs in the abdomen and then removed to collect cells. These cells are also looked at under a microscope to check for signs of cancer.

### Getting a second opinion

You may want to get a second opinion to confirm your stomach cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get important medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. The doctor who gives the second opinion may agree with your first doctor, suggest changes or another approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). For questions you might want to ask at your appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Stomach Cancer Survival Rates and Prognosis

If you’ve been diagnosed with stomach cancer, you may have questions about how serious the cancer is and your chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for stomach cancer depends on

- the stage of the cancer, including whether the cancer is only in the stomach or has spread to lymph nodes or other places in the body
- your overall health

When stomach cancer is found early, there is a better chance of recovery. Stomach cancer is often advanced when it is diagnosed. At advanced stages, stomach cancer can be treated but is rarely cured. Learn more about Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

### Survival rates for stomach cancer

Doctors estimate stomach cancer prognosis by using statistics collected over many years from people with stomach cancer. One statistic that is commonly used in making a prognosis is the 5-year relative survival rate. The 5-year relative survival rate tells you what percent of people with the same type and stage of stomach cancer are alive 5 years after their cancer was diagnosed, compared with people in the overall population. For example, the 5-year relative survival rate for stomach cancer is 36%. This means that, overall, people diagnosed with stomach cancer are 36% as likely as similar people who do not have stomach cancer to be alive 5 years after diagnosis.

The 5-year relative survival rates for different stages of stomach cancer are:

- 75% for localized stomach cancer (cancer is in the stomach only)
- 35% for regional stomach cancer (cancer has spread beyond the stomach to nearby lymph nodes or organs)
- 7% for metastatic stomach cancer (cancer has spread beyond the stomach to a distant part of the body)

### Understanding survival rate statistics

Because survival statistics are based on large groups of people, they cannot be used to predict exactly what will happen to you. The doctor who knows the most about your situation is in the best position to discuss these statistics and talk with you about your prognosis. It is important to note the following when reviewing survival statistics:

- No two people are alike, and responses to treatment can vary greatly.
- Survival statistics use information collected from large groups of people who may have received different types of treatment.
- It takes several years to see the effect of newer and better treatments, so current survival statistics may not reflect newer treatments.

To learn more about survival statistics and to see videos of patients and their doctors exploring their feelings about prognosis see Understanding Cancer Prognosis (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis).

## Stomach Cancer Stages

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the stage of the stomach cancer to plan the best treatment.

There are several staging systems for cancer that describe the extent of the cancer. Stomach cancer staging usually uses the TNM staging system. You may see your cancer described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your cancer, your doctor may describe it as one of these stages.

For information about how doctors stage stomach cancer, see the tests to stage stomach cancer section on Stomach Cancer Diagnosis (https://www.cancer.gov/types/stomach/diagnosis). Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

The information on this page is about staging for adenocarcinoma of the stomach, the most common type of stomach cancer.

### Layers of the stomach wall

The stomach wall is made up of five layers of tissue and muscle. Knowing about these layers can help you understand the stage of your cancer.

Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.

Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).

- The mucosa is the innermost layer of the stomach wall. It is made of both epithelial cells and glandular cells. The glandular cells make mucus to protect the stomach lining and digestive juices to help break down food. Most stomach cancers start in glandular cells of the mucosa. Cancers that start in glandular cells are adenocarcinomas.
- The submucosa is the layer of connective tissue between the mucosa and the muscle layer. It contains blood vessels, lymph vessels, and nerve cells.
- The muscle layer is the next layer. The muscle layer helps the stomach mix food with digestive juices and move it into the small intestine, where nutrients are absorbed.
- The subserosa is a thin layer of connective tissue between the muscle layer and the serosa.
- The serosa is the outermost layer of the stomach wall.

Stomach cancers become more advanced as they spread from the mucosa to the outer layers.

To learn more about the stomach, see What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)

### Stage 0 (carcinoma in situ) of the stomach

Stage 0 refers to carcinoma in situ. This means that abnormal cells are found in the mucosa. These abnormal cells may become cancer and spread into nearby normal tissue.

Learn about treatment of stage 0 (carcinoma in situ) of the stomach. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stage-0-stomach-cancer-carcinoma-in-situ)

### Stage I (also called stage 1) stomach cancer

Stage I is divided into stages IA and IB.

- In stage IA,
  - cancer has formed in the mucosa and may have spread to the submucosa.
- In stage IB,
  - cancer has formed in the mucosa and may have spread to the submucosa and has spread to 1 or 2 nearby lymph nodes; or
  - cancer has formed in the mucosa and has spread to the muscle layer.

Learn about treatment of stage I stomach cancer. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stage-i-stomach-cancer)

### Stage II (also called stage 2) stomach cancer

Stage II is divided into stages IIA and IIB.

- In stage IIA,
  - cancer may have spread to the submucosa and has spread to 3 to 6 nearby lymph nodes; or
  - cancer has spread to the muscle layer and to 1 or 2 nearby lymph nodes; or
  - cancer has spread to the subserosa.
- In stage IIB,
  - cancer may have spread to the submucosa and has spread to 7 to 15 nearby lymph nodes; or
  - cancer has spread to the muscle layer and to 3 to 6 nearby lymph nodes; or
  - cancer has spread to the subserosa and to 1 or 2 nearby lymph nodes; or
  - cancer has spread to the serosa.

Learn about treatment of stage II stomach cancer. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stages-ii-and-iii-stomach-cancer)

### Stage III (also called stage 3) stomach cancer

Stage III is divided into stages IIIA, IIIB, and IIIC.

- In stage IIIA,
  - cancer has spread to the muscle layer and to 7 to 15 nearby lymph nodes; or
  - cancer has spread to the subserosa and to 3 to 6 nearby lymph nodes; or
  - cancer has spread to the serosa and to 1 to 6 nearby lymph nodes; or
  - cancer has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen.
- In stage IIIB,
  - cancer may have spread to the submucosa or to the muscle layer and has spread to 16 or more nearby lymph nodes; or
  - cancer has spread to the subserosa or to the serosa and has spread to 7 to 15 nearby lymph nodes; or
  - cancer has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer has also spread to 1 to 6 nearby lymph nodes.
- In stage IIIC,
  - cancer has spread to the subserosa or to the serosa, and to 16 or more nearby lymph nodes; or
  - cancer has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer also has spread to 7 or more nearby lymph nodes.

Learn about treatment of stage III stomach cancer. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stages-ii-and-iii-stomach-cancer)

### Stage IV (also called stage 4) stomach cancer

In stage IV, cancer has spread to other parts of the body, such as the lungs, liver, distant lymph nodes, and the tissue that lines the abdomen wall.

Stage IV stomach cancer is also called metastatic stomach cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if stomach cancer spreads to the lung, the cancer cells in the lung are actually stomach cancer cells. The disease is called metastatic stomach cancer, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

Learn about treatment of stage IV stomach cancer. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stage-iv-stomach-cancer-stomach-cancer-that-cannot-be-removed-by-surgery-and-recurrent-stomach-cancer)

### Recurrent stomach cancer

Recurrent stomach cancer is cancer that has recurred (come back) after it has been treated. Stomach cancer may come back in the stomach, lymph nodes, or other parts of the body, such as the liver, lung, or bone. Tests will be done to help determine where the cancer has returned in your body. The type of treatment that you have for recurrent stomach cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in Coping with Stomach Cancer (https://www.cancer.gov/types/stomach/coping) and the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

Learn about treatment of recurrent stomach cancer. (https://www.cancer.gov/types/stomach/treatment/by-stage#treatment-of-stage-iv-stomach-cancer-stomach-cancer-that-cannot-be-removed-by-surgery-and-recurrent-stomach-cancer)

## Stomach Cancer Treatment

Different types of treatments are available for stomach cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You’ll want to learn what you need to do before treatment begins, how you’ll feel while going through it, and what kind of help you will need. To learn more, visit Questions to Ask Your Doctor about Your Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

Learn more at Stomach Cancer Treatment by Stage (https://www.cancer.gov/types/stomach/treatment/by-stage).

### Endoscopic mucosal resection

Endoscopic mucosal resection is a procedure that uses an endoscope to remove carcinoma in situ and early-stage cancer from the lining of the digestive tract. An endoscope is a thin, tube-like instrument with a light and a lens and tools to remove tissue.

### Surgery

Surgery is a common treatment for stomach cancer. The type of surgery depends on where the cancer is located.

Other treatments may be given in addition to surgery:

- Treatment given before surgery is called preoperative therapy or neoadjuvant therapy. Chemotherapy may be given before surgery to shrink the tumor and reduce the amount of tissue that needs to be removed during surgery. Chemoradiation given before surgery, to shrink the tumor, is being studied.
- Treatment given after surgery, to lower the risk that the cancer will come back, is called adjuvant therapy. After the doctor removes all the cancer that can be seen, some patients may be given chemotherapy, radiation therapy, or both to kill any cancer cells that are left.

#### Gastrectomy

Gastrectomy, the removal of part or all of the stomach, is the main surgery for stomach cancer:

- Subtotal gastrectomy is the removal of the part of the stomach that contains cancer, nearby lymph nodes, and parts of other tissues and organs near the tumor. The spleen may also be removed.
- Total gastrectomy is the removal of the entire stomach, nearby lymph nodes, and parts of the esophagus, small intestine, and other tissues near the tumor. The spleen may also be removed. Then the surgeon attaches the esophagus to the small intestine so the patient can continue to eat and swallow.

#### Endoluminal stent placement

Endoluminal stent placement may be done when the tumor blocks the passage into or out of the stomach. In this procedure, the surgeon places a stent (a thin, expandable tube) from the esophagus to the stomach or from the stomach to the small intestine to allow the patient to eat normally.

#### Endoluminal laser therapy

Endoluminal laser therapy is a procedure in which an endoscope (a thin, lighted tube) with a laser attached is used as a knife to open a gastrointestinal blockage.

#### Gastrojejunostomy

Gastrojejunostomy is the removal of the part of the stomach with cancer that is blocking the opening into the small intestine. Then the surgeon connects the stomach to the jejunum (a part of the small intestine) to allow food and medicine to pass from the stomach into the small intestine.

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Stomach cancer is sometimes treated with external radiation therapy. This type of radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing.

Chemotherapy for stomach cancer is usually systemic, meaning it is injected into a vein or given by mouth. When given this way, the drugs enter the bloodstream to reach cancer cells throughout the body.

Chemotherapy drugs used to treat stomach cancer include:

- capecitabine (https://www.cancer.gov/about-cancer/treatment/drugs/capecitabine)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- epirubicin (https://www.cancer.gov/about-cancer/treatment/drugs/epirubicinhydrochloride)
- fluorouracil (5-FU) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- leucovorin (https://www.cancer.gov/about-cancer/treatment/drugs/leucovorincalcium)
- oxaliplatin (https://www.cancer.gov/about-cancer/treatment/drugs/oxaliplatin)
- paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel)
- trifluridine and tipiracil (https://www.cancer.gov/about-cancer/treatment/drugs/trifluridine-tipiracilhydrochloride)

To learn more about how chemotherapy works, how it is given, common side effects, and more, visit Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

### Targeted therapy

Targeted therapy uses drugs or other substances to identify and attack specific cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Targeted therapies used to treat stomach cancer include:

- ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
- regorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/regorafenib)
- trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
- trastuzumab deruxtecan (https://www.cancer.gov/about-cancer/treatment/drugs/famtrastuzumabderuxtecan-nxki)
- zolbetuximab (https://www.cancer.gov/about-cancer/treatment/drugs/zolbetuximab-clzb)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Immunotherapy drugs used to treat stomach cancer include:

- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

These drugs work in more than one way to kill cancer cells. They are also considered targeted therapy because they target specific changes or substances in cancer cells.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy) and Immunotherapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/side-effects).

### Hyperthermic intraperitoneal chemotherapy (HIPEC)

Regional chemotherapy is a method of placing chemotherapy directly into an organ or a body cavity, such as the abdomen, to mainly affect cancer cells in those areas.

A type of regional chemotherapy called hyperthermic intraperitoneal chemotherapy, or hot chemotherapy, is being studied to treat stomach cancer and may be offered at certain treatment centers. After the surgeon has removed as much of the cancer as possible during surgery, a chemotherapy drug, such as mitomycin (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin) or cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin), is warmed and pumped directly into the peritoneal cavity through a thin tube for about 2 hours. The surgeon then drains the chemotherapy from the abdomen and rinses the abdomen before closing the incision.

### Clinical trials

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. For some patients, taking part in a clinical trial may be an option.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Clinical trials supported by other organizations can be found at ClinicalTrials.gov.

To learn more, visit Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up testing

Some tests that were done to diagnose or stage (https://www.cancer.gov/types/stomach/diagnosis) the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests. These tests are sometimes called follow-up tests or check-ups.

You may also have blood tests for tumor markers such as CEA and CA 19-9. Increased levels of these markers may mean your stomach cancer has come back. Learn more about Tumor Markers (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-fact-sheet).

## Stomach Cancer Treatment by Stage

Cancer stage is an important factor in deciding the best treatment for stomach cancer. Other factors, such as your preferences and overall health, are also important.

For some people, taking part in a clinical trial may be an option. Clinical trials of new cancer drugs or treatment combinations may be available. To learn more about clinical trials, including how to find and join a trial, visit Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of stage 0 stomach cancer (carcinoma in situ)

Gastrectomy (surgery to remove all or part of the stomach and nearby lymph nodes) is the main treatment for stage 0 stomach cancer (carcinoma in situ).

Endoscopic mucosal resection uses an endoscope to remove abnormal growths or tissue from the lining of the digestive tract without open surgery. It may be done in people with small tumors that have a low risk of spreading to nearby lymph nodes.

To learn more about these treatments, visit Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

### Treatment of stage I stomach cancer

Gastrectomy (surgery to remove all or part of the stomach and nearby lymph nodes) is the main treatment for stage I stomach cancer. Some people may receive chemotherapy and/or radiation therapy before or after surgery. Giving chemotherapy at the same time as radiation therapy may help the radiation therapy work better.

There are many chemotherapy drugs used for stage I stomach cancer, including capecitabine (https://www.cancer.gov/about-cancer/treatment/drugs/capecitabine), cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin), docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel), epirubicin (https://www.cancer.gov/about-cancer/treatment/drugs/epirubicinhydrochloride), fluorouracil (5-FU) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil), leucovorin (https://www.cancer.gov/about-cancer/treatment/drugs/leucovorincalcium), and oxaliplatin (https://www.cancer.gov/about-cancer/treatment/drugs/oxaliplatin). These drugs may be given alone or in combination.

Endoscopic mucosal resection is a less invasive procedure that may be used in people with small tumors that have a low risk of spreading to nearby lymph nodes.

To learn more about these treatments, visit Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

### Treatment of stages II and III stomach cancer

Gastrectomy (surgery to remove all or part of the stomach and nearby lymph nodes) is the main treatment for stage II stomach cancer and stage III stomach cancer. Some people may receive chemotherapy and/or radiation therapy before or after surgery. Giving chemotherapy at the same time as radiation therapy may help the radiation therapy work better.

There are many chemotherapy drugs used for stage II and stage III stomach cancer, including capecitabine, cisplatin, docetaxel, epirubicin, fluorouracil (5-FU), leucovorin, and oxaliplatin. These drugs may be given alone or in combination.

To learn more about these treatments, visit Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

### Treatment of stage IV stomach cancer, stomach cancer that cannot be removed by surgery, and recurrent stomach cancer

Treatment of stage IV stomach cancer, any stage of stomach cancer that cannot be removed by surgery, and recurrent stomach cancer is palliative. Palliative therapy is treatment meant to improve the quality of life of people who have a serious or life-threatening disease, such as cancer. Many of the same treatments for cancer, such as chemotherapy or other kinds of drugs and radiation therapy, can also be used for palliative therapy to help a patient feel more comfortable. Learn more about Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet).

The first palliative treatment for HER2-negative tumors might include chemotherapy with or without the immunotherapy drug nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) or chemotherapy with the targeted therapy drug zolbetuximab (https://www.cancer.gov/about-cancer/treatment/drugs/zolbetuximab-clzb). For HER2-positive tumors, it might include the immunotherapy drug pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) and the targeted therapy drug trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab) combined with chemotherapy.

Subsequent palliative therapy may include:

- chemotherapy
- ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab) with or without chemotherapy
- pembrolizumab for DNA mismatch repair deficiency cancer, microsatellite instability-high cancer, or tumor mutational burden-high cancer
- trastuzumab deruxtecan (https://www.cancer.gov/about-cancer/treatment/drugs/famtrastuzumabderuxtecan-nxki) for HER2-positive cancer

There are many chemotherapy drugs used as palliative therapy for advanced stomach cancer, including capecitabine, cisplatin, docetaxel, doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride), epirubicin, etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide), fluorouracil (5-FU), irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride), leucovorin, oxaliplatin, paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel), and trifluridine and tipiracil (https://www.cancer.gov/about-cancer/treatment/drugs/trifluridine-tipiracilhydrochloride). These drugs may be given alone or in combination.

A specific way of giving chemotherapy called hyperthermic intraperitoneal chemotherapy, or HIPEC, may be an option at some treatment centers. This treatment uses warmed chemotherapy to wash the inside of the abdomen during surgery.

If you have side effects from the cancer or its treatment, you may be given other treatments to help reduce those side effects so you are more comfortable. For example, if you have a blockage in your stomach, you may receive endoluminal laser therapy or endoluminal stent placement to relieve the blockage or a gastrojejunostomy to bypass the blockage. Radiation therapy or surgery may be done to stop bleeding, relieve pain, or shrink a tumor that is blocking the stomach.

To learn more about these treatments, visit Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment).

## Coping with Stomach Cancer

Stomach cancer and its treatments may cause physical and emotional side effects. When you first learn that you have stomach cancer, you may wonder how you’re going to cope with the upcoming changes in your life. One step you can take is to be informed of the changes that may occur and what resources are available to help you. Speaking up about any problems you have can give you a greater sense of control. Your health care team can talk with you about ways to reduce these side effects so you feel better.

For resources on the common physical side effects of treatment for stomach cancer, see Stomach Cancer Treatment (https://www.cancer.gov/types/stomach/treatment). Learn more about side effects of cancer treatment (https://www.cancer.gov/about-cancer/treatment/side-effects) and ways to manage them. For help with emotional side effects, see Emotions and Cancer (https://www.cancer.gov/about-cancer/coping/feelings).

### Changes in eating and nutrition

Stomach cancer and its treatments may affect your ability to eat enough food or absorb the nutrients from food. If part or all of your stomach has been removed, you might need to eat smaller amounts of food more often or make changes to what you eat. Your doctor or dietitian may recommend that you stay upright for some time after eating. They can also help you adjust your diet to make sure you get the nutrition you need.

To get tips on eating during cancer treatment, see Eating Hints: Before, during, and after Cancer Treatment (https://www.cancer.gov/publications/patient-education/eating-hints).

Learn more about how cancer affects nutrition in Nutrition in Cancer Care (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss/nutrition-pdq).

### Changes in body image

Stomach cancer and its treatment can change how you look and feel about yourself. Know that you aren't alone in how you feel. Coping with changes to your body and the way you see yourself can be hard. But, over time, many people learn to adjust and move forward.

Learn more about how body changes may affect your self-image and sex life after treatment and ways to cope and communicate your feelings in How Cancer Affects Your Self-Image and Sexuality (https://www.cancer.gov/about-cancer/coping/self-image).

### Stress in dealing with follow-up care

Many people who have been treated for stomach cancer need to visit their doctor regularly to get follow-up exams or tests. Planning and scheduling these appointments can be stressful and time-consuming. Waiting for test results can cause anxiety and an ongoing fear of recurrence. The added costs of things such as copays, medicines, and parking and transportation fees only add to the stress. For tips on how to deal with the fear of cancer coming back, see the section Coping with Fear of Recurrence on our A New Normal (https://www.cancer.gov/about-cancer/coping/survivorship/new-normal) page.

### Cost of cancer treatment

Cancer is one of the most costly diseases to treat in the United States. Even if you have health insurance, you may face major financial challenges and need help dealing with the costs of stomach cancer treatment. The problems a person has related to the cost of treatment is known as financial toxicity. For tips and ways to cope, see Managing Cancer Costs and Medical Information (https://www.cancer.gov/about-cancer/managing-care/track-care-costs). To learn about financial toxicity and find out if you are at risk, see Financial Toxicity (Financial Distress) and Cancer Treatment (https://www.cancer.gov/about-cancer/managing-care/track-care-costs/financial-toxicity-pdq).